# Lymphedema

Patient Version

This PDQ cancer information summary has current information about the causes and treatment of lymphedema. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## What is lymphedema?

Lymphedema is swelling caused by a buildup of lymph fluid in the body between the skin and muscle. Lymph fluid is part of the lymph system, which plays a role in your body’s ability to fight infection and disease. If you have cancer, the cancer or cancer treatment can disrupt the flow of lymph fluid and cause lymphedema (also known as secondary lymphedema). Lymphedema may arise soon after cancer treatment, or it may develop years after treatment has ended. Most often, it develops slowly over months or years.

The lymph system helps the body fight infection and is made up of lymph nodes, lymphatic vessels, and organs that collect and carry lymph fluid through the body. If cancer or cancer treatment disrupts the flow of lymph fluid or damages lymph nodes and vessels, lymph fluid may build up and cause lymphedema.

Lymphedema; drawing showing a female figure with a red, swollen arm. The lymph nodes and lymphatic vessels are also shown in the figure. There is a pull-out from the swollen arm showing a top layer of red, hardened skin. There is also a pull-out box from a lymphatic vessel below the skin that shows a cancerous tumor blocking the flow of lymph fluid through a lymphatic vessel and a buildup of fluid and white blood cells in the surrounding tissues.

Although lymphedema cannot be prevented, there are ways to lower your risk (https://www.cancer.gov/about-cancer/treatment/side-effects/lymphedema#can-i-prevent-lymphedema) or keep lymphedema from getting worse.

Once lymphedema develops, it is a chronic condition that cannot be cured but can be treated to relieve swelling and improve your ability to function day to day. Lymphedema is easier to control when treatment starts early, so contact your doctor as soon as you notice heaviness, swelling, or other signs of lymphedema (https://www.cancer.gov/about-cancer/treatment/side-effects/lymphedema#what-are-symptoms-of-lymphedema).

### What causes lymphedema?

Anything that blocks or changes the flow of lymph fluid in the body can cause lymphedema. Cancer and cancer treatments can cause lymphedema when:

- cancer or a tumor blocks the flow of lymph fluid
- surgery for cancer disrupts the flow of lymph fluid
- radiation therapy causes scar tissue that blocks the flow of lymph fluid

Your risk for lymphedema depends on the type and location of your cancer and the treatments you have. Other risk factors for lymphedema include having an infection, healing slowly after surgery, having lymph nodes removed, past surgeries or radiation, having advanced cancer, and being overweight or having obesity. Talk with your doctor to learn about your risk of lymphedema.

#### Lymphedema and breast cancer

Treatment for breast cancer often involves surgery that removes one or more lymph nodes in the underarm area, increasing the risk of lymphedema. If you have been treated for breast cancer with radiation therapy or surgery, you may develop lymphedema in your hand, arm, or chest on the side of the body where lymph nodes were removed or damaged.

#### Lymphedema and other cancers

Lymphedema can occur anywhere in the body, but it most commonly affects an arm or leg. Some cancers—especially those that form in the abdomen or genital area—and their treatments are more likely than others to cause lymphedema because they are located near lymph nodes and vessels. Lymphoma, a cancer that affects white blood cells (part of the lymph system), can also cause lymphedema as white blood cells build up and block lymph flow.

The type of cancer you have can help predict where you may develop lymphedema.

- People with vulvar, vaginal, ovarian, endometrial, cervical, prostate, or colorectal cancer may develop lymphedema in the leg, genitals, or abdomen.
- People with head and neck cancer may develop swelling in the face, neck, or under the chin. You may also develop lymphedema inside your body, such as in your throat, in which case the lymphedema may not be visible.

Lymphedema can also develop after surgery for melanoma and sarcoma.

### What are symptoms of lymphedema?

You may notice symptoms of lymphedema in an arm or leg or near where you had surgery or received radiation therapy. Signs and symptoms may develop slowly over time, so pay close attention to any slight changes. Contact your doctor if you notice any of these signs of lymphedema.

#### Signs and symptoms of lymphedema anywhere in the body

- A heavy, full, or tight feeling in the area where you had surgery or radiation therapy.
- Swelling. When you press on the swollen area, a dent may remain in the skin. However, as lymphedema gets worse, pressing on the swollen area may no longer leave a dent.
- Numbness or tingling in the affected area. Discomfort will worsen as lymphedema progresses.
- Discoloration and hardening of the skin in people with long-term, untreated lymphedema.

#### Signs and symptoms of lymphedema in the arms or legs

Lymphedema in your arm or leg may cause these additional signs and symptoms:

- a heavy, full, or tight feeling in your arm, leg, fingers, or toes
- swelling in an arm or leg that makes it appear larger than the other arm or leg
- difficulty moving your arm or leg
- weakness in your arm or leg

#### Signs and symptoms of lymphedema in the head or neck

Lymphedema in your head or neck may cause these additional signs and symptoms:

- swelling and a tight, uncomfortable feeling in your face, neck, or under your chin
- aching, tingling, pain, or numbness in your face, head, neck, shoulders, or ears
- difficulty moving your head or neck
- difficulty speaking, eating, swallowing, or breathing
- voice, vision, or hearing changes

#### Signs and symptoms of lymphedema in the genitals or abdomen

Lymphedema in your genitals or abdomen may cause these additional signs and symptoms:

- swelling in the genital area or abdomen
- difficult or painful urination
- pain during walking, sex, and other movements

#### Lymphedema and cellulitis

Cellulitis is a potentially life-threatening bacterial infection of the skin that is a common complication of lymphedema. People with lymphedema are at greater risk of cellulitis because skin in swollen areas is stretched thin, allowing easier entry of bacteria that thrive in fluid-rich areas of the body.

Some signs and symptoms of cellulitis are similar to those of lymphedema. Always check with your doctor about any skin changes or other symptoms you experience. Symptoms of cellulitis include:

- pain, tenderness, redness, and swelling in the affected area
- skin that feels warm to the touch in the swollen area
- fever

If you have a fever or other signs of cellulitis, call your doctor right away. If left untreated, cellulitis can become life-threatening. Your doctor can prescribe antibiotics to treat cellulitis.

### How is lymphedema diagnosed?

You should watch for lymphedema signs and symptoms, such as tightness or swelling in an arm or leg, during and after cancer treatment. If you alert your doctor to swelling or other changes you have noticed, your doctor will examine the swollen part of your body. If swelling is affecting an arm or leg, they will compare the size of your swollen arm or leg with that of the other limb.

You may also have one or more of the following tests to help your doctor better understand the cause of swelling and what is disrupting the flow of lymph fluid:

- Ultrasound uses high-energy sound waves to examine how fluid, such as blood and lymph, is moving through the body. Doctors can use ultrasound to find a blood clot that might be the cause of swelling.
- Magnetic resonance imaging (MRI) uses a dye, magnet, radio waves, and computer to make a series of detailed pictures of areas inside the body. Magnetic resonance lymphangiography (MRL) is like an MRI, but it makes pictures of the lymph system. Doctors can use MRI and MRL to identify what might be blocking the flow of lymph.
- CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- Lymphoscintigraphy uses a small amount of radioactive glucose to allow doctors to trace the flow of lymph fluid and identify blockages.
- Perometry and water displacement are noninvasive techniques used to estimate the volume of a limb in people at risk of lymphedema.
- Bioimpedance spectroscopy is a noninvasive technique used to measure the amount of fluid in the body. It can help determine whether a person who does not have symptoms is in the beginning stages of lymphedema. This tool is sometimes used to help prevent lymphedema in people who are at risk.

#### Lymphedema stages

If you are diagnosed with lymphedema, your doctor will use a staging system to describe the severity of your lymphedema.

- Stage 0: The flow of lymph in the body is not moving as it should. You may or may not have symptoms.
- Stage I: The affected area is swollen and feels heavy. Pressing on the swollen area leaves a pit (dent) in the skin. Resting and elevating the limb can help reduce swelling at this stage.
- Stage II: The affected area is more swollen and may feel firmer than the area around it. Pressing on the swollen area does not leave a pit. Resting and elevating the limb no longer reduces swelling.
- Stage III: The affected area is extremely swollen and the skin feels hard and thick. You may also have decreased mobility and dry, blistered skin in the affected area.

### How is lymphedema treated?

Treatments are available for managing the symptoms of lymphedema. Your health care team will talk with you about management techniques that can be done at home or under the supervision of a trained professional such as a nurse or a certified lymphedema therapist (CLT), a physical or occupational therapist trained to treat lymphedema. Treatments include:

#### Short stretch bandaging, compression wraps, leggings, or stockings

These can help move fluid around in your arms and legs to prevent it from building up. They may also be called compression garments. Your nurse or CLT will help you find garments that fit properly and will show you how to use them.

#### Manual lymphatic drainage

Manual lymphatic drainage, also called lymphatic drainage massage, involves gentle massage that helps move lymph fluid through the body. Lymphatic drainage is part of a treatment called complete decongestive therapy, which is managed by a CLT. Complete decongestive therapy may also include bandaging, exercises, and skin care to manage symptoms.

#### Compression pump

This is a device connected to a compression sleeve or sock that applies pressure intermittently to the arm or leg. The pumping action may help keep lymph fluid moving, preventing buildup in the limbs.

#### Surgery and other treatments

If lymphedema is advanced, your doctor may recommend surgery or another medical treatment.

- Lymphovenous bypass (also called lymphaticovenous anastomosis) is surgery that connects lymph vessels to a vein, creating a new path for lymph fluid to travel in the body.
- Lymphovenous transplant (also called vascularized lymph node transfer) is surgery that replaces damaged lymph nodes with healthy lymph nodes from elsewhere in a person’s body, helping improve lymph flow.
- Liposuction removes extra fat in the affected part of the body and may improve lymphedema symptoms.
- Laser therapy uses light to stimulate new growth of lymphatic vessels, improve the flow of lymph fluid, and help repair skin affected by lymphedema.

### Can I prevent lymphedema?

Although there is no way to prevent lymphedema, there are things you can do to lower your risk or keep it from getting worse. Your health care team may suggest the following things you can do at home:

- Protect your skin to prevent infection. Wear gloves when cooking and gardening to protect your hands from injury. Use lotion to prevent dry skin and cracks where bacteria can enter. If you get a burn or cut, ask your doctor about an antibacterial ointment to use. Always call your doctor if you notice redness or other signs of infection.
- Wear compression garments daily when you are up and moving around and at night as advised by your CLT.
- Learn manual lymph drainage techniques from your CLT that you can do at home.
- Exercise. Exercise is a natural pump for the lymph system. It can improve the flow of lymph fluid and keep the heart healthy, which may help treat lymphedema. Exercising may also help lower your risk of lymphedema. Talk with your doctor to find an exercise program that you enjoy and that is safe for you.
- Elevate the affected area when possible. If you have lymphedema in your arm, try to keep it raised above the level of your heart when sitting or resting. If you have lymphedema in your leg, elevate it while lying down by resting it on a pillow or rolled-up blankets.
- Stay at or get to a healthy weight. Being at a healthy weight can keep lymphedema under control.
- Avoid putting pressure on the affected area. Wear loose jewelry and clothes without tight bands or elastic. Avoid carrying handbags or other items with an affected arm. Blood pressure and blood draws should be taken using the arm without lymphedema.
- Avoid extreme heat and sun. High temperatures can make lymphedema worse. Use sunscreen and wear sun protection like hats and lightweight, long-sleeved shirts when spending time in the sun.
- Stay hydrated. Drinking plenty of water will help keep lymph fluid moving through the body.
- Reduce salt in your diet. Salt can make swelling worse by causing your body to retain fluid.

### Talking with your doctor about lymphedema

As you prepare for a visit with your doctor, nurse, or social worker, consider making a list of questions to ask and adding these questions about lymphedema:

- Does my type of cancer or treatment put me at risk of developing lymphedema?
- What changes should I look for? Which ones should I call you about?
- If I am at risk of developing lymphedema, are there things I can do to prevent it from starting or worsening?
- How long after my cancer treatment might symptoms of lymphedema occur? Will I be monitored for early symptoms?
- What steps can I take to lower my risk for lymphedema?
- Are there special garments I should wear during the day or night to prevent or treat lymphedema?
- If I am diagnosed with lymphedema, is there a certified lymphedema therapist I could meet with?

### Coping with lymphedema

The physical changes that result from lymphedema can affect your well-being. You may not be able to do the activities you once enjoyed or find clothes that fit properly. You may feel uncomfortable with the way you look and isolated from those around you. Working with a CLT is often the best way to manage and cope with lymphedema.

Side effects like lymphedema can be hard to deal with, both physically and emotionally. It’s important to ask for support from your health care team. They can help you prepare for and make it through difficult times. Learn more about ways to cope with cancer (https://www.cancer.gov/about-cancer/coping) including emotions that people with cancer often have (https://www.cancer.gov/about-cancer/coping/feelings) and ways to adjust to daily life during cancer treatment (https://www.cancer.gov/about-cancer/coping/day-to-day).

For family members and friends who are caring for someone with cancer, you may find these suggestions for caregivers (https://www.cancer.gov/about-cancer/coping/caregiver-support) to be helpful.

### Lymphedema research

Research is ongoing to discover new ways to prevent, diagnose, and treat lymphedema. Research studies called clinical trials help advance knowledge about lymphedema and other side effects of cancer and cancer treatment. Learn more at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

To find NCI-supported clinical trials for lymphedema, go to Lymphedema Clinical Trials (https://www.cancer.gov/research/participate/clinical-trials/disease/lymphedema). Clinical trials supported by other organizations can be found at ClinicalTrials.gov.

Advances in cancer surgery and treatments are helping reduce the chances of lymphedema in people with cancer. For example, sentinel lymph node biopsy (https://www.cancer.gov/about-cancer/diagnosis-staging/staging/sentinel-node-biopsy-fact-sheet) allows doctors to remove fewer lymph nodes when checking if the cancer has spread, decreasing the risk of lymphedema.

### Related Resources

- Lymphedema (PDQ®)–Health Professional Version (https://www.cancer.gov/about-cancer/treatment/side-effects/lymphedema/lymphedema-hp-pdq)
- Lymphatic Education & Research Network (https://lymphaticnetwork.org/)